# Mistletoe Extracts (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the use of mistletoe extracts in the treatment of people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board.

## Overview

- Mistletoe is a semiparasitic plant that grows on many types of trees, including apple, oak, pine, and elm (see Question 1).
- Mistletoe extracts are one of the most widely studied complementary and alternative medicine therapies in people with cancer. In Europe, mistletoe extracts are among the most prescribed drugs for patients with cancer (see Question 1).
- Mistletoe extracts are usually given by injection under the skin or, less often, into a vein, into the pleural cavity, or into a tumor (see Question 2).
- Few side effects have been reported from the use of mistletoe extracts (see Question 5).
- The U.S. Food and Drug Administration (FDA) has not approved mistletoe extracts as a treatment for cancer or any other medical condition (see Question 6).

## Questions and Answers About Mistletoe

1. What is mistletoe?
  Mistletoe is a semiparasitic plant that grows on many types of trees, including apple, oak, maple, elm, pine, and poplar. It has been used for hundreds of years to treat medical conditions such as epilepsy, asthma, hypertension, headaches, menopausal symptoms, infertility, dermatitis, arthritis, and rheumatism.
  Mistletoe extracts are one of the most widely studied complementary and alternative medicine therapies for cancer. In Europe, mistletoe extracts are among the most prescribed therapies for cancer patients.
  Mistletoe products vary, based on the following factors:
  - The species of mistletoe.
  - The type of host tree on which the mistletoe grows.
  - The time of year the plant is picked.
  - The type of extract used and if it is made with homeopathic methods.
  - The company that makes the product.
  Mistletoe extracts are made in water-based solutions or solutions of water and alcohol. Mistletoe products may be named by the type of tree on which the plant grows. For example, IscadorM is from apple trees, IscadorP comes from pine trees, IscadorQu is from oak trees, and IscadorU comes from elm trees.
2. How are mistletoe extracts given?
  Mistletoe extracts are usually given by an injection under the skin. Less common ways to give mistletoe extracts include by mouth, into a vein, into the pleural cavity, or into a tumor.
3. What laboratory or animal studies have been done using mistletoe extracts?
  In laboratory studies, a substance is tested in tumor cells to find out if it has any anticancer effects. In animal studies, a drug, procedure, or treatment is tested in mice or other animals to see if it is safe and effective. Laboratory and animal studies are done before a substance is tested in people.
  Laboratory and animal studies have tested the effects of mistletoe extracts. For information on laboratory and animal studies using mistletoe extracts, see the Laboratory/Animal/Preclinical Studies in the health professional version of this summary.
4. Have any studies of mistletoe extracts been done in people with cancer?
  Most clinical trials using mistletoe extracts to treat cancer have been done in Europe. Many studies use mistletoe products as adjuvant therapy in patients with cancer. Although some studies have shown that mistletoe extracts can work against cancer, these findings should be read with caution because some of the studies:
  - Have small numbers of participants.
  - Lack detailed information about participants.
  - Lack detailed information about doses.
  - Are poorly designed.
  Studies with large numbers of participants reported the following:
  Breast cancer
  - A study in postoperative early-stage breast cancer patients compared standard treatment and mistletoe extract to standard treatment alone. Less adverse drug reactions were reported in the group given mistletoe extract.
  - Another study in breast cancer patients compared survival between those who had standard therapy and mistletoe extract and those who had standard therapy alone. Improved survival was reported in the group given mistletoe extract.
  Colorectal cancer
  - A retrospective cohort study done between 1993 and 2000 looked at the use of mistletoe extract as long-term adjuvant therapy in patients treated with chemotherapy and/or radiation therapy for colorectal cancer that had not spread. The study found that patients treated with mistletoe extract had longer disease-free survival, fewer adverse events, and better symptom relief than patients who did not receive mistletoe extract as adjuvant therapy.
  Pancreatic cancer
  - A study published in 2013 looked at the use of mistletoe extract in advanced or metastatic pancreatic cancer. Patients received best supportive care and were randomly assigned to receive either mistletoe extract or no anticancer therapy. Results from the study showed that patients treated with mistletoe extract had improved survival compared with those who did not receive mistletoe extract.
  Non-small cell lung cancer
  - Two randomized clinical trials that compared chemotherapy to mistletoe extract in patients with non-small cell lung cancer reported no differences in quality of life between the two groups.
  - A study done between 1978 and 1987 looked at the use of mistletoe extract in non-small cell lung cancer that could not be treated with surgery. Patients were randomly assigned to receive one of 3 treatments: (1) a mistletoe extract injection; (2) an injection made from a sheep spleen said to stimulate the immune system and have antitumor effects; (3) a placebo injection of vitamin B. Results among the 3 groups were no different in survival or tumor response. It was noted that more patients in the mistletoe extract group than in the other groups reported an improved sense of well-being.
  Melanoma
  - A randomized clinical trial in melanoma patients treated with mistletoe extract for 1 year found that there was no increase in survival time.
  Reviews of combined clinical trials
  Reviews have looked at the effects of mistletoe extract on quality of life, survival, and symptom relief in different types of cancer. Some of the studies were well designed and reported benefits for patients, while others were not. A few studies reported a difference in survival or quality of life in patients who received mistletoe extract compared with those who did not.
  For more information on mistletoe extract studies, see the health professional version of Mistletoe Extracts.
5. Have any side effects or risks been reported from mistletoe extracts?
  Side effects from the use of mistletoe extracts include soreness and inflammation at injection sites, headache, fever, chills, nausea, and feeling very tired. A few cases of severe allergic reactions, including anaphylactic shock, have been reported.
  One review reported that treatment with mistletoe extract did not reduce immune system response. High doses of mistletoe extract damaged the liver in some cases, but the damage was repaired. Another review reported adverse effects that included circulatory problems, thrombophlebitis, swelling of lymph nodes, and allergic reactions.
  In an observational cohort study, three types of mistletoe extract (Iscador, Helixor, and abnobaVISCUM) were found to be safe in a small group of cancer patients with autoimmune diseases.
6. Is mistletoe extract approved by the U. S. Food and Drug Administration (FDA) for use as a cancer treatment in the United States?
  The FDA has not approved the use of mistletoe extract as a treatment for cancer or any other medical condition.

## Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Changes To This Summary (06/21/2023)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Changes were made to this summary to match those made to the health professional version.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the use of mistletoe extracts in the treatment of people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Mistletoe Extracts. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/patient/mistletoe-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389415]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).

## General CAM Information

Complementary and alternative medicine (CAM)—also called integrative medicine—includes a broad range of healing philosophies, approaches, and therapies. A therapy is generally called complementary when it is used in addition to conventional treatments; it is often called alternative when it is used instead of conventional treatment. (Conventional treatments are those that are widely accepted and practiced by the mainstream medical community.) Depending on how they are used, some therapies can be considered either complementary or alternative. Complementary and alternative therapies are used in an effort to prevent illness, reduce stress, prevent or reduce side effects and symptoms, or control or cure disease.

Unlike conventional treatments for cancer, complementary and alternative therapies are often not covered by insurance companies. Patients should check with their insurance provider to find out about coverage for complementary and alternative therapies.

Cancer patients considering complementary and alternative therapies should discuss this decision with their doctor, nurse, or pharmacist as they would any type of treatment. Some complementary and alternative therapies may affect their standard treatment or may be harmful when used with conventional treatment.

## Evaluation of CAM Therapies

It is important that the same scientific methods used to test conventional therapies are used to test CAM therapies. The National Cancer Institute and the National Center for Complementary and Integrative Health (NCCIH) are sponsoring a number of clinical trials (research studies) at medical centers to test CAM therapies for use in cancer.

Conventional approaches to cancer treatment have generally been studied for safety and effectiveness through a scientific process that includes clinical trials with large numbers of patients. Less is known about the safety and effectiveness of complementary and alternative methods. Few CAM therapies have been tested using demanding scientific methods. A small number of CAM therapies that were thought to be purely alternative approaches are now being used in cancer treatment—not as cures, but as complementary therapies that may help patients feel better and recover faster. One example is acupuncture. According to a panel of experts at a National Institutes of Health (NIH) meeting in November 1997, acupuncture has been found to help control nausea and vomiting caused by chemotherapy and pain related to surgery. However, some approaches, such as the use of laetrile, have been studied and found not to work and to possibly cause harm.

The NCI Best Case Series Program (https://cam.cancer.gov/indentifying_novel_cam_therapies/best_case_series_program.htm) which was started in 1991, is one way CAM approaches that are being used in practice are being studied. The program is overseen by the NCI’s Office of Cancer Complementary and Alternative Medicine (OCCAM). Health care professionals who offer alternative cancer therapies submit their patients’ medical records and related materials to OCCAM. OCCAM carefully reviews these materials to see if any seem worth further research.

## Questions to Ask Your Health Care Provider About CAM

When considering complementary and alternative therapies, patients should ask their health care provider the following questions:

- What side effects can be expected?
- What are the risks related to this therapy?
- What benefits can be expected from this therapy?
- Do the known benefits outweigh the risks?
- Will the therapy affect conventional treatment?
- Is this therapy part of a clinical trial?
- If so, who is the sponsor of the trial?
- Will the therapy be covered by health insurance?

## To Learn More About CAM

National Center for Complementary and Integrative Health (NCCIH)

The National Center for Complementary and Integrative Health (NCCIH) at the National Institutes of Health (NIH) facilitates research and evaluation of complementary and alternative practices, and provides information about a variety of approaches to health professionals and the public.

- NCCIH Clearinghouse
- Post Office Box 7923 Gaithersburg, MD 20898–7923
- Telephone: 1-888-644-6226 (toll free)
- TTY (for deaf and hard of hearing callers): 1-866-464-3615
- E-mail: info@nccih.nih.gov
- Website: https://nccih.nih.gov

CAM on PubMed

NCCIH and the NIH National Library of Medicine (NLM) jointly developed CAM on PubMed (https://nccih.nih.gov/research/camonpubmed), a free and easy-to-use search tool for finding CAM-related journal citations. As a subset of the NLM's PubMed bibliographic database, CAM on PubMed features more than 230,000 references and abstracts for CAM-related articles from scientific journals. This database also provides links to the websites of over 1,800 journals, allowing users to view full-text articles. (A subscription or other fee may be required to access full-text articles.)

Office of Cancer Complementary and Alternative Medicine

The NCI Office of Cancer Complementary and Alternative Medicine (OCCAM) coordinates the activities of the NCI in the area of complementary and alternative medicine (CAM). OCCAM supports CAM cancer research and provides information about cancer-related CAM to health providers and the general public via the NCI website (https://www.cancer.gov/).

National Cancer Institute (NCI) Cancer Information Service

U.S. residents may call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, toll free at 1-800-4-CANCER (1-800-422-6237) Monday through Friday from 9:00 am to 9:00 pm. A trained Cancer Information Specialist is available to answer your questions.

Food and Drug Administration

The Food and Drug Administration (FDA) regulates drugs and medical devices to ensure that they are safe and effective.

- Food and Drug Administration
- 10903 New Hampshire Avenue
- Silver Spring, MD 20993
- Telephone: 1-888-463-6332 (toll free)
- Website: http://www.fda.gov

Federal Trade Commission

The Federal Trade Commission (FTC) enforces consumer protection laws. Publications available from the FTC include:

- Who Cares: Sources of Information About Health Care Products and Services
- Fraudulent Health Claims: Don’t Be Fooled

- Consumer Response Center
- Federal Trade Commission
- 600 Pennsylvania Avenue, NW
- Washington, DC 20580
- Telephone: 1-877-FTC-HELP (1-877-382-4357) (toll free)
- TTY (for deaf and hard of hearing callers): 202-326-2502
- Website: http://www.ftc.gov